# Rare Cancers of Childhood Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of rare cancers of childhood. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## General Information About Rare Cancers of Childhood

Key Points for This Section
- Rare cancers of childhood are cancers not usually seen in children.

### Rare cancers of childhood are cancers not usually seen in children.

Cancer in children and adolescents is rare. Since 1975, the number of new cases of childhood cancer has slowly increased. Since 1975, the number of deaths from childhood cancer has decreased by more than half.

The cancers listed in this summary are so rare that most children's hospitals are likely to see less than a handful of some types in several years. Because these cancers are so rare, there is not a lot of information about what treatment works best. A child's treatment is often based on what has been learned from treating other children. Sometimes, information is available only from reports of the diagnosis, treatment, and follow-up of one child or a small group of children who were given the same type of treatment.

Molecular testing of tumors can sometimes help plan treatment. Children newly diagnosed with a rare cancer listed below may be eligible for molecular testing through the Molecular Characterization Initiative.

The Molecular Characterization Initiative offers free molecular testing to children, adolescents, and young adults with certain types of newly diagnosed cancer. The program is offered through NCI's Childhood Cancer Data Initiative. To learn more, visit About the Molecular Characterization Initiative (https://www.cancer.gov/research/areas/childhood/childhood-cancer-data-initiative/data-ecosystem/molecular-characterization).

Many different cancers are listed in this summary. They are grouped by where they are found in the body.

The Rare Cancers of Childhood Treatment summary has been separated into individual summaries for each topic. Please use the lists below or visit the individual summaries at PDQ Cancer Information Summaries: Pediatric Treatment (https://www.cancer.gov/publications/pdq/information-summaries/pediatric-treatment).

## Rare Cancers of the Head and Neck

### Nasopharyngeal Cancer

To learn more, visit Childhood Nasopharyngeal Cancer.

### Esthesioneuroblastoma

To learn more, visit Childhood Esthesioneuroblastoma.

### Thyroid Cancer

To learn more, visit Childhood Thyroid Cancer.

### Oral Cavity Cancer

To learn more, visit Childhood Oral Cavity Cancer.

### Salivary Gland Tumors

To learn more, visit Childhood Salivary Gland Tumors.

### Laryngeal Cancer and Papillomatosis

To learn more, visit Childhood Laryngeal Tumors.

### NUT Carcinoma

To learn more, visit Childhood NUT Carcinoma.

## Rare Cancers of the Chest

### Breast Cancer

To learn more, visit Childhood Breast Cancer Treatment.

### Lung Cancer

To learn more, visit:

- Childhood Tracheobronchial Tumors
- Pleuropulmonary Blastoma

### Esophageal Cancer

To learn more, visit Childhood Esophageal Cancer.

### Thymoma and Thymic Carcinoma

To learn more, visit Childhood Thymoma and Thymic Carcinoma Treatment.

### Heart Tumors

To learn more, visit Childhood Heart Tumors.

## Rare Cancers of the Abdomen

### Adrenocortical Carcinoma

To learn more, visit Childhood Adrenocortical Carcinoma Treatment.

### Stomach Cancer

To learn more, visit Childhood Stomach Cancer (https://www.cancer.gov/types/stomach/childhood).

### Pancreatic Cancer

To learn more, visit Childhood Pancreatic Cancer Treatment.

### Colorectal Cancer

To learn more, visit Childhood Colorectal Cancer Treatment.

### Gastrointestinal Neuroendocrine Tumors

To learn more, visit Childhood Gastrointestinal Neuroendocrine Tumors Treatment.

### Gastrointestinal Stromal Tumors

To learn more, visit Childhood Gastrointestinal Stromal Tumors Treatment.

## Rare Cancers of the Reproductive and Urinary Systems

### Bladder Cancer

To learn more, visit Childhood Bladder Cancer (https://www.cancer.gov/types/bladder/childhood).

### Testicular Cancer

To learn more, visit Childhood Testicular Cancer.

### Ovarian Cancer

To learn more, visit Childhood Ovarian Cancer.

### Cervical and Vaginal Cancers

To learn more, visit Childhood Cervical and Vaginal Cancers (https://www.cancer.gov/types/cervical/childhood-cervical-vaginal-cancer).

## Other Rare Cancers of Childhood

### Mesothelioma

To learn more, visit Childhood Mesothelioma Treatment.

### Multiple Endocrine Neoplasia Syndromes

To learn more, visit Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment.

### Pheochromocytoma and Paraganglioma

To learn more, visit Childhood Pheochromocytoma and Paraganglioma Treatment.

### Skin Cancer (Melanoma, Basal Cell Carcinoma, and Squamous Cell Carcinoma of the Skin)

To learn more, visit:

- Childhood Melanoma Treatment
- Childhood Basal Cell Carcinoma and Squamous Cell Carcinoma of the Skin Treatment

### Intraocular (Uveal) Melanoma

To learn more, visit Childhood Intraocular (Uveal) Melanoma Treatment.

### Chordoma

To learn more, visit Childhood Chordoma.

### Carcinoma of Unknown Primary

To learn more, visit Childhood Carcinoma of Unknown Primary Treatment.

## To Learn More About Childhood Cancer

For more information from the National Cancer Institute about rare cancers of childhood, visit:

- Genetic Testing for Inherited Cancer Risk (https://www.cancer.gov/about-cancer/causes-prevention/genetics/genetic-testing-fact-sheet)
- Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet)
- MyPART - My Pediatric and Adult Rare Tumor Network (https://www.cancer.gov/nci/pediatric-adult-rare-tumor)

For more childhood cancer information and other general cancer resources, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Late Effects of Treatment for Childhood Cancer
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of rare cancers of childhood. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Rare Cancers of Childhood Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/childhood-cancers/patient/rare-childhood-cancers-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389276]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).